# Cancer Fatigue

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of fatigue. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## What is cancer fatigue?

Cancer fatigue is a condition caused by cancer or cancer treatment in which you feel exhausted or extremely tired. Some people with cancer have extreme fatigue most of the time and are unable to carry out day-to-day tasks. Others feel only very tired. Cancer fatigue may also be called cancer-related fatigue or cancer treatment-related fatigue.

Cancer fatigue is different from fatigue you may have felt in the past. When a healthy person is tired, fatigue is usually caused by activity and goes away after resting or sleeping. However, cancer fatigue is not completely relieved by sleep or rest and may happen after no or minimal activity.

### Cancer fatigue is common

Cancer fatigue is one of the most common side effects of cancer treatment. More than 80% of people with cancer experience fatigue while receiving chemotherapy or radiation therapy.

### Cancer fatigue can occur at any time

Fatigue can begin at any time—before, during, or after cancer treatment. Sometimes it’s an early symptom of cancer, or it can be brought on by the stress of a cancer diagnosis. Fatigue may worsen gradually as you go through treatment, or it may come on suddenly. Fatigue usually decreases after cancer treatment ends, but some people may still feel fatigue for months or years.

### Cancer fatigue can affect many areas of your life

Fatigue can affect not only your daily activities but also your family, work, and social life. Although cancer fatigue can feel overwhelming, your health care team can help you find ways to manage, treat, and cope with fatigue that are tailored to you.

### Cancer fatigue symptoms

Whether and how you experience fatigue depends on factors such as the type of cancer, stage of cancer, cancer treatment(s) you are receiving, and your overall physical and emotional health, nutrition, and sleep patterns.

Symptoms of cancer fatigue include:

- having no energy; feeling extremely tired, drained, or lethargic
- having difficulty moving; feeling heavy or slow
- having difficulty thinking, remembering, or paying attention
- having a sense of physical, emotional, and/or mental exhaustion
- not feeling rested, even after sleeping

### Causes of cancer fatigue

Cancer itself, cancer treatments, and the side effects of treatment can cause fatigue. Additional sources of fatigue may be stress, changes to your schedule, and other medical conditions.

#### Fatigue from cancer

Sometimes the source of fatigue in someone with cancer is the cancer itself. Cancer cells use calories and nutrients that your body needs for energy, making you feel fatigued. Cancer can also cause your body to release cytokines, naturally produced substances that help your body to fight infections and cancer but that can cause fatigue when released at high levels. Cachexia, a wasting syndrome that causes muscle and weight loss in some people with cancer, can also lead to fatigue.

Certain types of cancer are more likely to cause fatigue than others.

- Blood cancers such as leukemia, lymphoma, and multiple myeloma affect the bone marrow, making it difficult for your body to produce healthy blood cells. If your red blood cell count is low, your body’s tissues can’t get enough oxygen, resulting in fatigue.
- Breast cancer and prostate cancer can affect your hormone levels, which can lead to fatigue.
- Gastrointestinal system cancers such as stomach cancer and colorectal cancer can affect the way your body processes and uses food.

#### Fatigue from cancer treatments

Many cancer treatments can reduce your energy level. Each treatment may affect fatigue differently, and the treatment’s schedule and dose can influence how fatigued you are and when you feel most tired. Receiving more than one treatment can increase fatigue.

- Fatigue after surgery. Fatigue is common following surgery while your body is using energy to heal. Pain medicine given after surgery can also cause fatigue. Fatigue from surgery usually improves with time, but when surgery is combined with other treatments, fatigue may last longer.
- Fatigue from chemotherapy (chemo fatigue). Chemotherapy destroys healthy cells while treating cancer cells, causing you to feel fatigued. Some people feel the most tired after each chemotherapy treatment, whereas others may have worse fatigue halfway through their course of treatment. Fatigue decreases after chemotherapy is finished, but you may not feel back to normal for a month or more.
- Fatigue from radiation therapy. Doctors don’t fully understand why radiation therapy causes fatigue. After radiation therapy begins, fatigue usually increases until midway through the course of treatment then stays about the same until treatment ends.
- Fatigue from other treatments. Hormone therapies, immunotherapies, and targeted therapies can all cause fatigue. The timing of when fatigue arises and when it improves can vary depending on the specific treatments and the side effects you experience.

#### Fatigue from side effects of cancer treatment

Some side effects of cancer treatment can cause or worsen fatigue.

- Anemia (https://www.cancer.gov/about-cancer/treatment/side-effects/anemia). Some types of chemotherapy stop bone marrow from making enough new red blood cells, causing anemia (too few red blood cells to carry oxygen to the body’s tissues). Being anemic can lower your energy level.
- Appetite loss (https://www.cancer.gov/about-cancer/treatment/side-effects/appetite-loss). Your body’s energy comes from food. If you are not eating well, your body may not get the energy it needs.
- Diarrhea (https://www.cancer.gov/about-cancer/treatment/side-effects/diarrhea). Some cancer treatments cause the body to lose fluid and electrolytes in frequent loose stools. This can lead to dehydration and result in fatigue.
- Hot flashes. Some medications change your hormone levels. This can cause hot flashes that may result in night sweats that disrupt your sleep.
- Infection (https://www.cancer.gov/about-cancer/treatment/side-effects/infection). Your body uses energy to fight an infection. You may also have other symptoms with an infection, such as a fever, that can cause fatigue.
- Pain (https://www.cancer.gov/about-cancer/treatment/side-effects/pain). Pain can cause fatigue for many reasons. Lack of sleep from any type of pain will cause fatigue. Medications for treating pain can also make your fatigue worse.
- Sleep problems (https://www.cancer.gov/about-cancer/treatment/side-effects/sleep-problems). Many people with cancer have trouble sleeping at night. This can be due to your cancer, medication, or a disrupted sleep pattern, such as sleeping a lot during the day.
- Vomiting (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting). Chemotherapy can cause nausea and vomiting before, during, or after it is given. This leads to dehydration from loss of body fluids, which can bring on fatigue.

#### Fatigue from the emotional impact of cancer

Having a major illness such as cancer can cause you to feel anxious, worried, or fearful. High levels of distress can lead to physical problems such as fatigue, insomnia, and appetite loss. Learn about common emotions experienced by people with cancer and ways to cope (https://www.cancer.gov/about-cancer/coping/feelings).

Sometimes people experiencing fatigue develop depression. Although it’s normal to feel down at times, depression is more serious. Learn about distress and anxiety (https://www.cancer.gov/about-cancer/coping/feelings/anxiety-distress-pdq) as well as symptoms and treatment for depression (https://www.cancer.gov/about-cancer/coping/feelings/depression-pdq).

### Talking with your doctor about cancer fatigue

Tell your health care team if you feel very weak and tired—especially if you are not able to do your normal activities or are still very tired even after resting or sleeping.

Your doctor may give you a chart, log, or fatigue diary to help you record your energy level and fatigue each day. This information, together with medical tests, can help your doctor determine the best way for you to manage or cope with fatigue.

#### Questions to ask your doctor, nurse, or social worker about cancer fatigue

- What is most likely causing my fatigue?
- Am I at higher risk for fatigue based on the type of cancer I have or the treatment I am receiving?
- What can I do to have more energy? Are medical treatments recommended?
- Is exercise recommended? What types of movement or other relaxing activities have you found helps people with cancer fatigue?
- How much sleep should I get at night? How much rest or sleep may be helpful during the day?
- What foods and drinks do you advise? Which should I avoid?
- What signs or symptoms should I call you about?

#### Medical tests used to assess fatigue

Your health care team may check for medical conditions that contribute to fatigue. They’ll perform a physical exam and blood test to check for anemia or infections.

Your health care team may also ask a series of standard questions about how tired you feel and how it is affecting your daily life. This is called a fatigue assessment. Your health care team will repeat this assessment to see if there is a pattern for when fatigue starts or becomes worse and how to best prevent, manage, or treat it. The same method of measuring fatigue is used at each assessment. This helps show changes in fatigue over time.

### Treating cancer fatigue

Your health care team will often treat fatigue by relieving related conditions. They’ll choose a treatment based on your symptoms and whether they know what’s causing the fatigue. When the cause of fatigue is not known, your doctor will treat your symptoms and teach you ways to manage or cope with fatigue.

#### Medical treatment for cancer fatigue

- Treating anemia. Treatments for anemia may include dietary changes, blood transfusions, or drugs. Learn more about Anemia: Cancer Treatment Side Effect (https://www.cancer.gov/about-cancer/treatment/side-effects/anemia).
- Treating pain. Controlling pain can help you feel less tired, but fatigue can also be a side effect of pain medicine. To decrease fatigue, your doctor may recommend switching to a different pain medicine or adjusting the dose or time of day when you take it. Learn more about Pain Management for People with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/pain).
- Treating depression and anxiety. Sometimes fatigue is worsened by feelings of stress, fear, and hopelessness. Mental health therapists can use cognitive behavioral therapy and talk therapy to help you manage these feelings, which can help decrease fatigue. People with cancer who have a depression diagnosis may also take antidepressant drugs to manage fatigue.
- Other therapies that may help fatigue. Your health care team may recommend respiratory therapy to help with shortness of breath or other breathing problems that can cause fatigue. They also may recommend physical therapy, which can relieve nerve or muscle problems and help you maintain physical function and strength during and after treatment.
- Medicines for cancer fatigue. Although there are no standard drug treatments for cancer fatigue, several drugs are being studied for a possible role in treatment.
  - Psychostimulants are drugs that improve mood and help decrease fatigue and depression. They may increase energy and improve the ability to think and concentrate in some people with cancer, but the FDA has not yet approved psychostimulants for treating fatigue.
  - Bupropion is an antidepressant that is being studied to treat fatigue in people with cancer with or without depression.
  - Steroids are being studied in people with advanced cancer. Dexamethasone is a steroid that reduces inflammation but has unwanted side effects.

#### Managing cancer fatigue

Eliminating fatigue is not always possible, but there are ways to help lessen or manage cancer fatigue. Talk with your health care team about things you can try. Some possibilities include:

- Rest and sleep.
  - Practice good sleep habits. It is common for people going through treatment for cancer to have changes in their sleep patterns or difficulty sleeping. If you are having problems sleeping, learn how to manage sleep problems in Sleep Disorders (https://www.cancer.gov/about-cancer/treatment/side-effects/sleep-disorders-pdq).
  - Plan time to rest. If you are tired, take short naps of less than one hour during the day. Keep in mind that sleeping too much during the day can make it difficult to sleep well at night.
  - Start with what's most important. Choose activities that are most important to you and do them when you have the most energy. Limit activities that increase your fatigue.
- Exercise and physical activity. Exercise (including walking) may help people with cancer feel better and have more energy during and after treatment. Choose a physical activity you enjoy. Talk with your health care team or a physical therapist to make an exercise plan that’s right for you.
- Food and drink. Meet with a registered dietitian to learn about foods and drinks that have the nutrients you need to keep up your energy level. Many people find it easier to eat many small meals throughout the day than three big meals. Drink plenty of water and limit your intake of caffeine and alcohol. Get more tips on eating well in this booklet: Eating Hints: Before, during, and after Cancer Treatment (https://www.cancer.gov/publications/patient-education/eating-hints).​​​​​​
- Mind–body practices. Mind–body practices such as qigong, tai chi, and yoga have been found to reduce fatigue for people with cancer. Many of these practices combine movement, stretching, balance, and controlled breathing with meditation. Relaxation techniques, guided imagery, hypnosis, and acupuncture are other therapies that may help with fatigue. Ask your health care team if there are any programs offered in your community. Learn more about complementary, alternative, and integrative health practices (https://www.nccih.nih.gov/health/complementary-alternative-or-integrative-health-whats-in-a-name).
- Supplements. American ginseng in the form of capsules of ground ginger root may be used to treat fatigue. Other dietary supplements, such as coenzyme Q10 and L-carnitine, are also being studied in clinical trials. However, there is no evidence that these supplements reduce cancer fatigue. Learn more about Coenzyme Q10 (https://www.cancer.gov/about-cancer/treatment/cam/patient/coenzyme-q10-pdq).

### Getting support if you have cancer fatigue

If you have fatigue from cancer, you or your caregivers may need help coping. Know that you are not alone and seek support from family and friends and your health care team.

- Support from family and friends. People close to you can help with important tasks such as making meals, cleaning, and driving. Get advice on how to ask for help at Changes for the Family (https://www.cancer.gov/about-cancer/coping/adjusting-to-cancer/changes-for-family).
- Support from health care providers. If you are having difficulty managing daily activities, your nurse or social worker may help you find services to assist with personal needs such as eating and bathing.
- Support for caregivers. If you are caring for someone who has fatigue, it is important to know what resources are available to you. Learn more in Support for Caregivers of Cancer Patients (https://www.cancer.gov/about-cancer/coping/caregiver-support).

### Related Resources

- Complementary and Alternative Medicine for Patients (https://www.cancer.gov/about-cancer/treatment/cam/patient)
- Fatigue (PDQ®)–Health Professional Version (https://www.cancer.gov/about-cancer/treatment/side-effects/fatigue/fatigue-hp-pdq)
- Virtual Mind–Body Fitness Classes Show Unexpected Benefit in People with Cancer (https://www.cancer.gov/news-events/cancer-currents-blog/2023/mind-body-fitness-cancer-side-effects)
- New Approach May Help People with Cancer Better Manage Depression, Pain, and Fatigue (https://www.cancer.gov/news-events/cancer-currents-blog/2024/cancer-symptoms-stepped-collaborative-care)